# Childhood Stomach (Gastric) Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood stomach (gastric) cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## Childhood Stomach Cancer

Childhood stomach cancer is a very rare cancer that starts in the cells lining the stomach. The stomach is an organ on the left side of the upper abdomen that digests food. The stomach is part of the digestive tract, a series of hollow, muscular organs joined in a long, twisting tube from the mouth to the anus. The digestive tract processes nutrients in foods that are eaten and helps pass waste material out of the body:

- Food moves from the throat to the stomach through a tube called the esophagus.
- After food enters the stomach, it is broken down by stomach muscles that mix the food and liquid with digestive juices.
- After leaving the stomach, partly digested food passes into the small intestine and then into the large intestine.
- The end of the large intestine, called the rectum, stores the waste from the digested food until it is pushed out of the anus during a bowel movement.

Anatomy of the digestive tract. The digestive tract is made up of organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.

Anatomy of the digestive tract; drawing shows the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.

### Causes and risk factors for childhood stomach cancer

Childhood stomach cancer is caused by certain changes to the way stomach cells function, especially how they grow and divide into new cells. Often, the exact cause of the cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with a risk factor will develop stomach cancer, and it will develop in some children who don't have a known risk factor.

Risk factors for childhood stomach cancer include:

- H. pylori infection. Chronic infection of the mucosal layer of the stomach with H. pylori is a risk factor for stomach cancer. This bacterium spreads from person to person through direct contact with saliva, vomit, or stool. Although many people with chronic H. pylori infections do not have symptoms, some develop stomach ulcers or inflammation of the stomach called atrophic gastritis. In some people, atrophic gastritis leads to increasingly severe changes in the stomach lining and eventually to stomach cancer or gastric MALT lymphoma. Treatment of H. pylori infections reduces the risk of these types of stomach cancer. Learn more about H. pylori and cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/h-pylori-fact-sheet).
- Hereditary diffuse gastric cancer (HDGC). HDGC is a rare, inherited type of stomach cancer caused by a mutation (change) in the CDH1 gene. Learn more about HDGC (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-digestive-system-tumors/hereditary-diffuse-gastric-cancer).

Talk with your child's doctor if you think your child might be at risk of stomach cancer.

### Genetic counseling for children with stomach cancer

It may not be clear from the family medical history whether a child with stomach cancer has an inherited condition that increased their risk. Genetic testing may help explain why a child develops a rare cancer or a cancer that is usually seen in adults, such as stomach cancer. Genetic counselors and other specially trained health professionals can discuss your child's diagnosis and your family's medical history to help you understand:

- your options for CDH1 gene testing for hereditary diffuse gastric cancer
- the risk of other cancers for your child
- the risk of stomach cancer and other cancers for your child's siblings
- the risks and benefits of learning genetic information

Genetic counselors can also help you cope with your child's genetic testing results, including how to discuss the results with family members.

### Symptoms of childhood stomach cancer

Many children do not have symptoms of stomach cancer until the cancer has spread. It's important to check with your child's doctor if your child has:

- stomach pain
- loss of appetite
- weight loss for no known reason
- nausea
- vomiting
- constipation or diarrhea
- weakness
- anemia (symptoms of which may include tiredness, dizziness, fast or irregular heartbeat, shortness of breath, and pale skin)

These symptoms may be caused by conditions other than childhood stomach cancer. The only way to know is to see your child's doctor. The doctor will ask you when the symptoms started and how often your child has been having them as a first step in making a diagnosis.

### Diagnosis of childhood stomach cancer

If your child has symptoms that suggest stomach cancer, the doctor will need to find out if they are due to cancer or another condition. The doctor will ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend tests to find out if your child has stomach cancer.

The following tests and procedures are used to diagnose stomach cancer. The results will also help you and your child's doctor plan treatment.

#### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.

Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

#### Upper endoscopy with biopsy

Upper endoscopy is a procedure to look inside the esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is passed through the mouth and down the throat into the esophagus. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples (biopsy), which are checked under a microscope for signs of cancer.

The sample of tissue may be used for biomarker testing.

Talk with your child's doctor about what to expect during and after your child's biopsy.

Learn about the type of information that can be found in a pathologist's report about the cells or tissue removed during a biopsy at Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet).

#### Barium swallow

Barium swallow is a series of x-rays of the esophagus and stomach. The patient drinks a liquid that contains barium (a silver-white metallic compound). The liquid coats the esophagus and stomach, and x-rays are taken. This procedure is also called an upper GI series.

### Getting a second opinion

You may want to get a second opinion to confirm your child's stomach cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Prognostic factors for childhood stomach cancer

If your child has been diagnosed with stomach cancer, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. The prognosis can be affected by whether the cancer has spread to other parts of the body at the time of diagnosis and how well the cancer responds to treatment. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Stages of childhood stomach cancer

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. There is no staging system used for childhood stomach cancer, but the tests and procedures done to diagnose the cancer are also used to help plan treatment.

### Types of treatment for childhood stomach cancer

There are different types of treatment for children and adolescents with stomach cancer. You and your child's cancer care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for childhood stomach cancer. The pediatric oncologist works with other pediatric health care providers who are experts in treating children with cancer and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric gastroenterologist
- pediatric surgeon
- radiation oncologist
- pathologist
- pediatric nurse specialist
- social worker
- rehabilitation specialist
- psychologist
- child-life specialist
- fertility specialist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's cancer care team before treatment begins about what to expect. For help every step of the way, see our downloadable booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

The types of treatment your child might have include:

#### Surgery

Surgery to remove the tumor is the main treatment for stomach cancer.

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Stomach cancer is sometimes treated with external beam radiation therapy. This type of radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Radiation therapy may be given alone or with other treatments, such as chemotherapy.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy may be given alone or with other types of treatment, such as radiation therapy.

For stomach cancer, the chemotherapy is injected into a vein. When given this way, the drugs enter the bloodstream to reach cancer cells throughout the body. Chemotherapy drugs used alone or in combination to treat stomach cancer in children are:

- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil)
- irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
- mitomycin C (https://www.cancer.gov/about-cancer/treatment/drugs/mitomycin)
- nitrosoureas

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of childhood stomach cancer

Treatment of newly diagnosed stomach cancer in children may include:

- surgery to remove the cancer and some healthy tissue around it
- surgery to remove as much of the cancer as possible, followed by radiation therapy and chemotherapy

If your child's cancer comes back after treatment, their doctor will talk with you about what to expect and next steps. There might be treatment options that may shrink the cancer or control its growth. If there are no treatments, your child can receive care to control symptoms from cancer so they can be as comfortable as possible.

### Side effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer) or other conditions

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments.

Learn more about Late Effects of Treatment for Childhood Cancer (https://www.cancer.gov/types/childhood-cancers/late-effects-pdq).

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

### Coping with cancer

When your child has cancer, every member of the family needs support. Honest and calm conversations build trust as you talk with your child and their siblings. Taking care of yourself during this difficult time is also important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).